# Hereditary Kidney Cancer Syndromes (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the genetics of kidney cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Genetics Editorial Board.

## What is kidney cancer?

Key Points for This Section
- Kidney cancer is a disease in which malignant (cancer) cells form in tubules of the kidney.

### Kidney cancer is a disease in which malignant (cancer) cells form in tubules of the kidney.

Kidney cancer (also called renal cell cancer) is cancer that starts in the lining of very small tubes in the kidney called renal tubules. There are two kidneys, one on each side of the backbone, above the waist. Tubules in the kidneys filter and clean the blood. They take out waste products and make urine. The urine passes from each kidney through a long tube called a ureter into the bladder. The bladder holds the urine until it passes through the urethra and leaves the body.

Anatomy of the male urinary system (left panel) and female urinary system (right panel) showing the kidneys, ureters, bladder, and urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel). Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.

Anatomy of the male urinary system (left panel) and female urinary system (right panel); two-panel drawing showing the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel).

Cancer that starts in the ureters or the renal pelvis (the part of the kidney that collects urine and drains it to the ureters) is called urothelial cancer. This kind of cancer is different from renal cell cancer and is not associated with the hereditary cancer syndromes described in this summary. Urothelial cancer of the renal pelvis may be associated with another hereditary condition called Lynch syndrome. To learn more, see the health professional summary on Genetics of Colorectal Cancer.

## What is hereditary kidney cancer?

Key Points for This Section
- Having certain hereditary syndromes can increase the risk of kidney cancer.
- Hereditary and non-inherited kidney cancers are different in several ways.

### Having certain hereditary syndromes can increase the risk of kidney cancer.

Most of the time, kidney cancer risk is not passed down from parent to child. Kidney cancer that affects multiple generations of a family is called hereditary kidney cancer. Hereditary kidney cancer accounts for only 5%‒8% of all kidney cancers. It is usually linked to a hereditary cancer syndrome. A hereditary cancer syndrome is a disorder in which family members have a higher-than-average risk of developing a certain type or types of cancer. Hereditary cancer syndromes are caused by inherited, harmful genetic changes (also called pathogenic variants or mutations) in certain genes. Hereditary cancer syndromes are sometimes called inherited cancer syndromes or family cancer syndromes. People with the hereditary cancer syndromes described in this summary have an increased risk of kidney cancer.

The hereditary cancer syndromes described in this summary are:

- hereditary leiomyomatosis and renal cell cancer (HLRCC)
- von Hippel-Lindau disease (VHL)
- Birt-Hogg-Dubé syndrome (BHD)
- hereditary papillary renal cancer (HPRC)

Every person inherits two copies of each gene, one from each parent. These syndromes occur when a person inherits a mutation in one copy of the gene associated with the syndrome. This form of inheritance is called autosomal dominant inheritance.

Autosomal dominant inheritance is a way a genetic trait or condition can be passed down from parent to child. One copy of a mutated (changed) gene from one parent can cause the genetic condition. A child who has a parent with the mutated gene has a 50% chance of inheriting that mutated gene. Men and women are equally likely to have these mutations and sons and daughters are equally likely to inherit them.

Drawing showing an autosomal dominant inheritance pattern between a father, mother, and their four children: a chromosome pair with a normal gene and a mutated gene in an affected father; two normal genes in an unaffected mother; a normal gene and a mutated gene in an affected daughter and in an affected son; and two normal genes in an unaffected daughter and in an unaffected son.

### Hereditary and non-inherited kidney cancers are different in several ways.

- Hereditary kidney cancer is often diagnosed at an earlier age than sporadic kidney cancer.
- Some types of hereditary kidney cancer can be more or less aggressive than sporadic kidney cancer.
- The treatments for hereditary kidney cancer may be different from treatments for sporadic kidney cancer.
- People with hereditary kidney cancer may have a higher risk of other conditions or types of cancer.

This page provides information about hereditary syndromes associated with kidney cancer. It does not cover information about sporadic kidney cancer or somatic mutations found during tumor sequencing.

## What is genetic counseling and who should receive it?

Key Points for This Section
- Genetic counseling is a communication process between a specially trained health professional and a person concerned about the genetic risk of disease.
- Whether a person should get tested for hereditary kidney cancer depends on certain factors.

### Genetic counseling is a communication process between a specially trained health professional and a person concerned about the genetic risk of disease.

It is not always easy to determine whether a condition in a family is inherited. Genetic counselors and other specially trained health professionals can help patients understand their personal and family medical history, their options for genetic testing, and the risks and benefits of learning genetic information. If a patient chooses to get genetic testing, it may be done using a sample of blood, saliva, or skin. Genetic test results can reveal information about other family members and can create tension in the family. Genetic counselors can help people cope with their genetic testing results, including how to discuss the results with family members.

### Whether a person should get tested for hereditary kidney cancer depends on certain factors.

Certain clues in the medical history or family history may lead health professionals to think that a person may have a hereditary syndrome. With kidney cancer, people who have one or more of the following criteria may be referred for genetic counseling and testing:

- family history of multiple relatives diagnosed with kidney cancer
- cancer developed at a young age
- multiple tumors in one kidney or cancer in both kidneys
- diagnosis of a type of kidney cancer that is commonly inherited

## What are the major hereditary kidney cancer syndromes?

Key Points for This Section
- Four hereditary kidney cancer syndromes and the genes that cause them have been identified.

### Four hereditary kidney cancer syndromes and the genes that cause them have been identified.

### Hereditary Leiomyomatosis and Renal Cell Cancer (HLRCC)

HLRCC was considered rare, but it may be one of the most common hereditary cancer syndromes. Some people who have HLRCC may not have symptoms. HLRCC is caused by harmful changes (also called mutations or pathogenic variants) in the FH gene. People with HLRCC could have an increased risk of kidney cancer. The risk may be higher in males with FH mutations. Black people diagnosed with kidney cancer have more FH mutations than people from other racial and ethnic groups. HLRCC is associated with a unique type of kidney cancer that can be fast growing. People with HLRCC may also develop leiomyomas (benign smooth-muscle tumors) in the skin and uterus (fibroids) or paragangliomas (benign tumors near adrenal glands, blood vessels, or nerves).

Areas of the body affected by hereditary leiomyomatosis and renal cell cancer (HLRCC). HLRCC is an inherited disorder that causes an increased risk of kidney cancer. It can also cause lesions in the skin and uterus (in females).

Drawing showing areas of the body affected by hereditary leiomyomatosis and renal cell cancer, including the skin, kidneys, and uterus.

The FH gene makes a protein called fumarase. Fumarase helps cells use oxygen and produce energy. When the FH gene is mutated, cells are not able to use oxygen, which may lead to cancer. HLRCC is inherited in an autosomal dominant manner. This means that if one parent has HLRCC, there is a 50% (1 in 2) chance their child will inherit the mutation in the FH gene.

Learn more about HLRCC from the NCATS Genetic and Rare Diseases Information Center (https://rarediseases.info.nih.gov/diseases/10096/hereditary-leiomyomatosis-and-renal-cell-cancer).

### Von Hippel-Lindau Disease (VHL)

VHL is a rare hereditary syndrome that is caused by harmful changes (also called mutations or pathogenic variants) in the VHL gene. People with VHL have an increased risk of kidney cancer and renal cysts. VHL is associated with a clear-cell type kidney cancer, which is typically slow growing. People with VHL may also develop malignant (cancer) and benign (noncancer) tumors in many parts of the body, including the central nervous system, retina, pancreas, adrenal glands, endolymphatic sac, epididymis (in males), and broad ligament (in females).

Areas of the body affected by von Hippel-Lindau (VHL) disease. VHL disease is an inherited disorder that causes tumors and cysts to grow in certain areas of the body, including the central nervous system (including the brainstem, cerebellum, and spinal cord), retina, endolymphatic sac in the ear, adrenal glands, pancreas, kidneys, epididymis (in males), and broad ligament (in females). VHL disease also causes an increased risk of certain types of cancer, especially kidney cancer and pancreatic cancer.

Drawing of a male figure and female figure showing areas of the body affected by von Hippel-Lindau disease. These areas include the central nervous system (including the brainstem, cerebellum, and spinal cord), retina, endolymphatic sac in the ear, adrenal glands, pancreas, kidneys, epididymis (in males), and broad ligament (in females).

The VHL gene is a type of gene called tumor suppressor gene. Normally, the VHL gene prevents cells from growing and dividing too quickly. When the VHL gene is mutated in certain ways and loses its protective function, uncontrolled cell growth may lead to cancer. VHL is inherited in an autosomal dominant manner. If one parent has VHL, there is a 50% (1 in 2) chance their child will inherit the harmful genetic change in the VHL gene.

Learn more about VHL from the NCATS Genetic and Rare Diseases Information Center (https://rarediseases.info.nih.gov/diseases/7855/von-hippel-lindau-disease).

### Birt-Hogg-Dubé Syndrome (BHD)

BHD is a rare hereditary syndrome caused by harmful changes (also called mutations or pathogenic variants) in the FLCN gene. People with BHD have an increased risk of multiple types of kidney cancer that are typically slow growing. People with BHD may also develop skin tumors called fibrofolliculomas, lung cysts, and spontaneous pneumothorax (collapsed lung).

Areas of the body affected by Birt-Hogg-Dube (BHD) syndrome. BHD syndrome is an inherited disorder that causes an increased risk of kidney cancer, benign (not cancer) skin lesions, collapsed lungs, and lung cysts.

Drawing showing areas of the body affected by Birt-Hogg-Dube syndrome, including the skin, lungs, and kidneys.

The FLCN gene is a tumor suppressor gene. Normally, the FLCN gene prevents cells from growing and dividing too quickly. When the FLCN gene is mutated, uncontrolled cell growth may lead to cancer. BHD is inherited in an autosomal dominant manner. This means that if one parent has BHD, there is a 50% (1 in 2) chance their child will inherit the mutation in the FLCN gene.

Learn more about BHD from the NCATS Genetic and Rare Diseases Information Center (https://rarediseases.info.nih.gov/diseases/2322/birt-hogg-dube-syndrome).

### Hereditary Papillary Renal Cancer (HPRC)

HPRC is a rare hereditary syndrome caused by harmful changes (also called mutations or pathogenic variants) in the MET gene. People with HPRC have an increased risk of a type of kidney cancer called papillary kidney cancer, which is typically slow growing. Papillary kidney cancer forms in the cells lining the very small tubes in the kidney called renal tubules.

Papillary renal cancer forms in cells that line the renal tubules in the kidney. The renal tubules remove waste from the blood and make urine. Urine moves through the renal tubules into the renal pelvis and ureter, which carries urine from the kidney to the bladder.

Papillary renal cancer; drawing showing the left kidney, renal pelvis, and ureter. Also shown is a pullout of the renal tubules, which is where urine is made.

The MET gene makes a protein called MET that is involved in cell signaling and growth. When the MET gene is mutated, cells may not respond to signals that normally prevent them from growing, causing cancer to develop. HPRC is inherited in an autosomal dominant manner. This means that if one parent has HPRC, there is a 50% (1 in 2) chance their child will inherit the mutation in the MET gene.

Learn more about papillary kidney cancer from the NCATS Genetic and Rare Diseases Information Center (https://rarediseases.info.nih.gov/diseases/9572/papillary-renal-cell-carcinoma).

## What happens after a hereditary kidney cancer syndrome diagnosis?

Most recommendations for screening and treating people with kidney cancer are based on evidence obtained from clinical trials. Because families with these hereditary kidney cancer syndromes are rare, many of these studies did not include these types of hereditary kidney cancer. When studies of families with hereditary syndromes are not available, guidelines on how to monitor and care for patients with inherited kidney cancer are based on the expert opinion and consensus of health care professionals who have experience in treating families with these syndromes.

Families with these hereditary syndromes are watched closely for signs of disease in the kidneys and in other organs. Most kidney tumors that occur can be removed by surgery, but they may recur (come back). Other treatment options may be available.

To learn more about screening and treatment options for each hereditary syndrome, see the health professional summaries on Hereditary Leiomyomatosis and Renal Cell Cancer (HLRCC), Von Hippel-Lindau Disease (VHL), Birt-Hogg-Dubé Syndrome (BHD), and Hereditary Papillary Renal Carcinoma (HPRC). Learn about the treatment of kidney cancer in the general population at Renal Cell Cancer Treatment.

## Are clinical trials available for hereditary kidney cancer syndromes?

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Learn more about kidney (renal cell) cancer

For more information from the National Cancer Institute and the National Institutes of Health about kidney cancer and genetics, see:

- Kidney Cancer Home Page (https://www.cancer.gov/types/kidney)
- Drugs Approved for Kidney Cancer (https://www.cancer.gov/about-cancer/treatment/drugs/kidney)
- Genetic Testing for Inherited Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
- Genetic and Rare Diseases Information Center (https://rarediseases.info.nih.gov/)
- MedlinePlus: Genetics (https://medlineplus.gov/genetics/)
- Renal Cell Cancer Treatment
- Transitional Cell Cancer of the Renal Pelvis and Ureter Treatment
- Wilms Tumor and Other Childhood Kidney Tumors Treatment

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the genetics of kidney cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ Hereditary Kidney Cancer Syndromes. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/kidney/patient/kidney-genetics-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).